# Medicinal Mushrooms (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of medicinal mushrooms in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Introduction

Medicinal mushrooms are mushrooms that are used as medicine. They have been used to treat infection for hundreds of years, mostly in Asia. Today, medicinal mushrooms are also used to treat lung diseases and cancer. For more than 30 years, medicinal mushrooms have been approved as an addition to standard cancer treatments in Japan and China. In these countries, mushrooms have been used safely for a long time, either alone or combined with radiation or chemotherapy.

In Asia, there are more than 100 types of mushrooms used to treat cancer. Some of the more common ones are Ganoderma lucidum (reishi), Trametes versicolor or Coriolus versicolor (turkey tail), Lentinus edodes (shiitake), and Grifola frondosa (maitake).

Mushrooms are being studied to find out how they affect the immune system and if they stop or slow the growth of tumors or kill tumor cells. It is thought that certain chemical compounds, such as polysaccharides (beta-glucans) in turkey tail mushrooms, strengthen the immune system to fight cancer.

This summary gives an overview of the use of medicinal mushrooms in treating cancer. The following information is given for Trametes versicolor, also called Coriolus versicolor (turkey tail), and Ganoderma lucidum (reishi):

- How it is given or taken.
- Reviews of laboratory and animal studies.
- Results of clinical trials (studies in humans).
- Side effects.
- U.S. Food and Drug Administration (FDA) information.

## Questions and Answers About Turkey Tail and Polysaccharide-K (PSK)

1. What is turkey tail?
  Turkey tail is a type of mushroom that grows on dead logs worldwide. It's named turkey tail because its rings of brown and tan look like the tail feathers of a turkey. Its scientific name is Trametes versicolor or Coriolus versicolor. In traditional Chinese medicine, it is known as Yun Zhi. In Japan, it is known as kawaratake (roof tile fungus). There are many other types of Trametes mushrooms. It can be hard to tell the difference between turkey tail and other types of Trametes mushrooms without the use of special testing.
  Turkey tail has been used in traditional Chinese medicine to treat lung diseases for many years. In Japan, turkey tail has been used to strengthen the immune system when given with standard cancer treatment.
2. What is PSK?
  Polysaccharide K (PSK) is the best known active compound in turkey tail mushrooms. In Japan, PSK is an approved mushroom product used to treat cancer.
3. How is PSK given or taken?
  PSK can be taken as a tea or in capsule form.
4. Have any laboratory or animal studies been done using PSK?
  In laboratory studies, tumor cells are used to test a substance to find out if it is likely to have any anticancer effects. In animal studies, tests are done to see if a drug, procedure, or treatment is safe and effective in animals. Laboratory and animal studies are done before a substance is tested in people.
  Laboratory and animal studies have tested the effects of PSK on the immune system, including immune cells called natural killer cells and T-cells. For more information on laboratory and animal studies done using PSK, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Medicinal Mushrooms.
5. Have any studies of PSK been done in people?
  PSK has been studied in patients with gastric cancer, breast cancer, colorectal cancer, and lung cancer. It has been used as adjuvant therapy in thousands of cancer patients since the mid-1970s. PSK has been safely used in people for a long time in Japan and few side effects have been reported.
  Gastric cancer
  Studies show that the use of PSK as adjuvant therapy in patients with gastric (stomach) cancer may help repair immune cell damage caused by chemotherapy and strengthen the immune system.
  Studies of PSK as adjuvant therapy for gastric cancer include the following:
  - A randomized clinical trial in Japan done between 1978 and 1981 included 751 patients who had surgery for gastric cancer. After surgery, patients received chemotherapy with or without PSK. On average, the patients who received chemotherapy and PSK lived longer than those who received chemotherapy alone. The researchers believe it might be possible to predict which patients would benefit the most from PSK depending on the numbers of granulocytes and lymphocytes in the patient’s blood.
  - In 1994, a study in Japan followed 262 patients who had successful surgery for gastric cancer and were given chemotherapy with or without PSK. Patients who received chemotherapy and PSK were less likely to have recurrent cancer and lived longer than those who did not. Treatment with PSK caused few side effects. The researchers thought the study showed that PSK and chemotherapy should be given to gastric cancer patients after surgery to remove the cancer.
  - A review published in 2007 combined results from 8 randomized controlled trials in 8,009 patients who had surgery to remove gastric cancers. After surgery, patients in the trials were given chemotherapy with or without PSK. The results suggest that receiving chemotherapy and PSK helped patients live longer after surgery.
  Breast cancer
  To date, PSK studies in patients with breast cancer have focused on changes in the immune system (T-cell and B-cell levels in the blood) rather than on clinical results (patient survival, symptoms, side effects, and quality of life).
  Colorectal cancer
  Studies of PSK as adjuvant therapy for colorectal cancer include the following:
  - PSK was studied in a randomized clinical trial for its effect on the immune system in patients with stage II or stage III rectal cancer. Patients received chemotherapy and radiation therapy, with or without PSK. This study found that PSK increased the number of cancer-killing immune cells and had anticancer effects in tissue that received radiation therapy.
  - A review that combined results from 3 studies in 1,094 patients with colorectal cancer found that patients who received PSK were less likely to have recurrent cancer and lived longer than those who did not.
  - Two groups from Japan studied patients with colorectal cancer who received adjuvant chemotherapy with or without PSK after surgery. In the first study, patients who were treated with both chemotherapy and PSK had markedly better 10-year survival rates. In the second study of patients who were older than 70 years, 3-year survival rates were markedly higher in the group treated with both chemotherapy and PSK.
  Lung cancer
  Studies of PSK as adjuvant therapy for patients with lung cancer include the following:
  - Five nonrandomized clinical trials reported that patients treated with PSK and radiation therapy with or without chemotherapy lived longer.
  - Six randomized clinical trials in patients with lung cancer studied chemotherapy with or without PSK. The studies showed that patients who received PSK improved in one or more ways, including immune function, body weight, well-being, tumor-related symptoms, or longer survival.
6. Have any side effects or risks been reported from turkey tail or PSK?
  There have been few side effects reported in studies of PSK in Japan.
7. Is turkey tail or PSK approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of turkey tail or its active compound PSK as a treatment for cancer or any other medical condition.
  The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of mushroom supplements may not be the same.

## Questions and Answers About Reishi

1. What is reishi?
  Reishi is a type of mushroom that grows on live trees. Scientists may call it either Ganoderma lucidum or Ganoderma sinense. In traditional Chinese medicine, this group of mushrooms is known as Ling Zhi. In Japan, they are known as Reishi. In China, G. lucidum is known as Chizhi and G. sinense is known as Zizhi.
  There are many other types of Ganoderma mushrooms and it is hard to tell the medicinal mushrooms from the other types.
  Reishi has been used as medicine for a very long time in East Asia. It was thought to prolong life, prevent aging, and increase energy. In China, it is being used to strengthen the immune system of cancer patients who receive chemotherapy or radiation therapy.
2. How is reishi given or taken?
  Reishi is usually dried and taken as an extract in the form of a liquid, capsule, or powder.
3. Have any laboratory or animal studies been conducted using reishi?
  In laboratory studies, tumor cells are used to test a new substance and find out if it is likely to have any anticancer effects. In animal studies, tests are done to see if a drug, procedure, or treatment is safe and effective in animals. Laboratory and animal studies are done before a substance is tested in people.
  Laboratory and animal studies have tested the effects of the active ingredients in reishi mushrooms, triterpenoids and polysaccharides, on tumors, including lung cancer. For information on laboratory and animal studies done using reishi, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Medicinal Mushrooms.
4. Have any studies of reishi mushrooms been done in people?
  Studies using products made from reishi have been done in China and Japan.
  Lung cancer
  Studies suggest that the use of products made from reishi as adjuvant therapy may help strengthen the immune system in patients with lung cancer.
  Studies in patients with lung cancer include the following:
  - In an open-label trial done in China, 36 patients with advanced lung cancer were given an over-the-counter product made from reishi called Ganopoly. The patients were being treated with chemotherapy or radiation therapy, along with other complementary therapies. Some patients had marked changes in the immune responses being studied, such as lymphocyte count and natural killer cell activity, and some patients had no change in immune response.
  - In China, a study was done with 12 lung cancer patients. Their blood was tested to see if taking a product made from reishi could help improve immune response. The study found that the polysaccharides in reishi mushrooms may help cancer-fighting immune cells, called lymphocytes, stay active.
  Colorectal cancer
  The following study looked at reishi for the prevention of colorectal cancer:
  - In Japan, 225 patients with benign colorectal tumors were studied. For 12 months, 123 of the patients were given an extract of the mushroom G. lucidum mycelia (MAK), while 102 patients did not receive treatment with MAK. At 12 months, a follow-up colonoscopy was done on all the patients. The number and the size of the tumors decreased in the group that received MAK, but not in the group that did not receive MAK. The researchers suggest that MAK may help stop benign colorectal tumors from forming.
5. Is reishi approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of reishi as a treatment for cancer or any other medical condition.
  The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of mushroom supplements may not be the same.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of medicinal mushrooms in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Medicinal Mushrooms. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/mushrooms-pdq. Accessed <MM/DD/YYYY>. [PMID: 28267306]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov